# Childhood Soft Tissue Sarcoma (PDQ®)

Patient Version

This PDQ cancer information summary has current information about the treatment of childhood soft tissue sarcoma. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Pediatric Treatment Editorial Board.

## What is childhood soft tissue sarcoma?

Childhood soft tissue sarcoma is cancer that forms in muscle, fat, fibrous tissue, blood vessels, or other supporting tissue of the body.

Soft tissues of the body connect, support, and surround other body parts and organs. The soft tissues include:

- fat
- bone
- cartilage
- fibrous tissue
- muscles
- nerves
- tendons (bands of tissue that connect muscles to bones)
- synovial tissues (tissues around joints)
- blood vessels
- lymph vessels

Soft tissue sarcoma may occur anywhere in the body. In children, the tumors form most often in the arms, legs, chest, or abdomen.

Soft tissue sarcoma forms in the soft tissues of the body, including the muscles, tendons, ligaments, cartilage, fat, blood vessels, lymph vessels, nerves, and tissues around joints.

Soft tissue sarcoma; drawing shows different types of tissue in the body where soft tissue sarcomas form, including the lymph vessels, blood vessels, fat, muscles, tendons, ligaments, cartilage, and nerves.

Soft tissue sarcoma occurs in children and adults. Soft tissue sarcoma in children may respond differently to treatment and may have a better prognosis than soft tissue sarcoma in adults. Learn more about soft tissue sarcoma in adults at Soft Tissue Sarcoma Treatment.

## Types of soft tissue sarcoma

There are many types of soft tissue sarcoma. They are grouped based on the type of soft tissue cell where they first formed.

This summary is about the following types of soft tissue sarcoma:

### Blood vessel tumors

Blood vessel tumors include the following types:

- Epithelioid hemangioendothelioma. Epithelioid hemangioendothelioma can occur in children but is most common in adults between 30 and 50 years. It may occur in the liver, lung, bone, skin, or soft tissue. Epithelioid hemangioendothelioma may be fast growing or slow growing. In about a third of patients with a tumor in the soft tissue, the tumor spreads to other parts of the body very quickly. Learn more at Childhood Vascular Tumors.
- Angiosarcoma. Angiosarcoma is a fast-growing cancer that forms in the blood vessels or lymph vessels in any part of the body, usually in the soft tissue. Most angiosarcomas are in the skin or in the soft tissue near the skin. Those in deeper soft tissue can form in the liver, spleen, and lung. This cancer is very rare in children. Children sometimes have more than one tumor in the skin, liver, or both. Rarely, infantile hemangioma may become angiosarcoma. Learn more at Childhood Vascular Tumors.

### Bone tumors

Extraskeletal osteosarcoma. This type of bone and cartilage cancer is very rare in children and adolescents. It is likely to come back after treatment and may spread to the lungs. Osteosarcoma occurs more often in bone.

### Cartilage tumors

Extraskeletal mesenchymal chondrosarcoma. This type of cartilage cancer often affects young adults and occurs in the head and neck. It is usually high grade (likely to grow quickly) and may spread to other parts of the body. It may also come back many years after treatment.

### Fat tissue tumors

Liposarcoma. This is a cancer of the fat cells. Liposarcoma usually forms in the fat layer just under the skin. In children and adolescents, liposarcoma is often low grade (likely to grow and spread slowly). Liposarcoma may spread to the lungs and rarely to the lymph nodes. There are several different types of liposarcoma, including:

- Myxoid liposarcoma. Learn about Myxoid/Round Cell Liposarcoma (https://www.cancer.gov/pediatric-adult-rare-tumor/rare-tumors/rare-soft-tissue-tumors/myxoid-round-cell-liposarcoma).
- Myxoid pleomorphic liposarcoma. This is a rare cancer that most often forms in the middle of the chest in children, adolescents, and young adults. This cancer is high grade and can grow quickly and spread to other areas in the body.
- Pleomorphic liposarcoma. This is usually a high-grade cancer that is less likely to respond well to treatment. Pleomorphic liposarcoma often forms in older adults.

### Fibrous connective tissue tumors

Fibrous connective tissue tumors have several subtypes, including:

- Desmoid-type fibromatosis. Learn about Desmoid Tumor (https://www.cancer.gov/pediatric-adult-rare-tumor/rare-tumors/rare-soft-tissue-tumors/desmoid-tumor).
- Dermatofibrosarcoma protuberans. This is a cancer of the deep layers of the skin that most often forms in the trunk, arms, or legs. Dermatofibrosarcoma protuberans usually does not spread to the lymph nodes or other parts of the body.
  Some cancers have cells with a certain genetic change called a translocation (part of one chromosome switches places with part of another chromosome). In dermatofibrosarcoma protuberans, an abnormal gene is formed when the COL1A1 gene switches places with part of the PDGFRB gene. To diagnose dermatofibrosarcoma protuberans, the cancer cells are checked for this genetic change.
- Inflammatory myofibroblastic tumor. This rare tumor can occur in the soft tissue or organs in children and young adults. Learn about Inflammatory Myofibroblastic Tumor (IMT) (https://www.cancer.gov/pediatric-adult-rare-tumor/rare-tumors/rare-soft-tissue-tumors/inflammatory-myofibroblastic-tumor).
- Fibrosarcoma. There are two types of fibrosarcoma in children and adolescents:
  - Infantile fibrosarcoma (also called congenital fibrosarcoma). This type of fibrosarcoma usually occurs in children 1 year and younger and may be seen in a prenatal ultrasound exam. This cancer is fast growing and is often large at diagnosis. It rarely spreads to distant parts of the body.
    Some cancers have cells with a certain genetic change called a translocation (part of one chromosome switches places with part of another chromosome). In infantile fibrosarcoma, an abnormal gene is formed when the ETV6 gene on chromosome 12 switches places with the NTRK3 gene on another chromosome. To diagnose infantile fibrosarcoma, the cancer cells are checked for this genetic change. A similar tumor has been seen in older children, but it does not have the translocation that is often seen in younger children. Other abnormal genes involved in infantile fibrosarcoma are BRAF, ALK, RAF1, GOLGA4, LRRFIP2, and CLIP1.
  - Adult-type fibrosarcoma. This is the same fibrosarcoma found in adults. The cells of this cancer do not have the genetic change found in infantile fibrosarcoma. Learn more about soft tissue sarcoma in adults at Soft Tissue Sarcoma Treatment.
- Myxofibrosarcoma. This is a rare fibrous tissue cancer that occurs less often in children than in adults.
- Low-grade fibromyxoid sarcoma. This is a slow-growing cancer that forms deep in the arms or legs and mostly affects young and middle-aged adults. The cancer may come back many years after treatment and spread to the lungs and the lining of the chest wall. Lifelong follow-up is needed.
- Sclerosing epithelioid fibrosarcoma. Learn about Sclerosing Epithelioid Fibrosarcoma (https://www.cancer.gov/pediatric-adult-rare-tumor/rare-tumors/rare-soft-tissue-tumors/sclerosing-epithelioid-fibrosarcoma).

### Pericytic (perivascular) tumors

Pericytic tumors form in cells that wrap around blood vessels. There are different types of pericytic tumors, including:

- Myopericytoma. Infantile hemangiopericytoma is a type of myopericytoma. Children younger than 1 year at the time of diagnosis may have a better prognosis. In children older than 1 year, infantile hemangiopericytoma is more likely to spread to other parts of the body, including the lymph nodes and lungs.
- Infantile myofibromatosis. Infantile myofibromatosis is another type of myopericytoma. It often occurs in the skin of children younger than 2 years. Learn about Infantile Myofibromatosis (https://www.cancer.gov/pediatric-adult-rare-tumor/rare-tumors/rare-soft-tissue-tumors/infantile-myofibromatosis).

### Peripheral nerve sheath tumor

The nerve sheath is made up of protective layers of myelin that cover nerve cells that are not part of the brain or spinal cord. Learn about Malignant Peripheral Nerve Sheath Tumor (https://www.cancer.gov/pediatric-adult-rare-tumor/rare-tumors/rare-soft-tissue-tumors/mpnst).

### Skeletal muscle tumors

Skeletal muscle is attached to bones and helps the body move.

- Rhabdomyosarcoma. Rhabdomyosarcoma is the most common childhood soft tissue sarcoma in children 14 years and younger. Learn more about Childhood Rhabdomyosarcoma Treatment.
- Ectomesenchymoma. This is a fast-growing tumor that occurs mainly in children. Ectomesenchymoma may form in the eye socket, abdomen, arms, or legs.

### Smooth muscle tumors

Smooth muscle lines the inside of blood vessels and hollow internal organs such as the stomach, intestines, bladder, and uterus. Learn about Leiomyosarcoma (https://www.cancer.gov/pediatric-adult-rare-tumor/rare-tumors/rare-soft-tissue-tumors/leiomyosarcoma).

### So-called fibrohistiocytic tumors

- Plexiform fibrohistiocytic tumor. This is a rare tumor that usually affects children and young adults. The tumor usually starts as a painless growth on or just under the skin on the arm, hand, or wrist. It may rarely spread to nearby lymph nodes or to the lungs.

### Tumors of unknown cell origin

Tumors of unknown cell origin (the type of cell the tumor first formed in is not known) have many subtypes, including:

- Myxoma. Myxoma is a tumor that can occur in the heart or skin. This tumor is frequently seen in children with Carney complex. Carney complex is a rare condition marked by spots on the skin, and tumors in the heart, endocrine glands, skin, and nerves. Carney complex may be linked to gene changes in the PRKAR1A gene.
- Synovial sarcoma. Synovial sarcoma is a common type of soft tissue sarcoma in children and adolescents. Learn about Synovial Sarcoma (https://www.cancer.gov/pediatric-adult-rare-tumor/rare-tumors/rare-soft-tissue-tumors/synovial-sarcoma).
- Epithelioid sarcoma. This is a rare sarcoma that usually starts deep in soft tissue as a slow growing, firm lump and may spread to the lymph nodes. If cancer formed in the arms, legs, or buttocks, a sentinel lymph node biopsy may be done to check for cancer in the lymph nodes. Epithelioid sarcoma is linked to a change in a tumor suppressor gene called SMARCB1. This type of gene makes a protein that helps control cell growth.
- Alveolar soft part sarcoma. This tumor occurs in adolescents and young adults. Learn about Alveolar Soft Part Sarcoma (ASPS) (https://www.cancer.gov/pediatric-adult-rare-tumor/rare-tumors/rare-soft-tissue-tumors/alveolar-soft-part-sarcomas).
- Clear cell sarcoma. This cancer occurs in older children and young adults. Learn about Clear Cell Sarcoma (https://www.cancer.gov/pediatric-adult-rare-tumor/rare-tumors/rare-soft-tissue-tumors/clear-cell-sarcoma).
- Extraskeletal myxoid chondrosarcoma. This type of soft tissue sarcoma may occur in children and adolescents. Over time, it tends to spread to other parts of the body, including the lymph nodes and lungs. The tumor may come back many years after treatment.
- Extraskeletal Ewing sarcoma. This cancer most often occurs in the bone but can form in the soft tissue. Learn more about Ewing Sarcoma Treatment.
- Desmoplastic small round cell tumor. This tumor usually forms in the abdomen. Learn about Desmoplastic Small Round Cell Tumors (DSRCT) (https://www.cancer.gov/pediatric-adult-rare-tumor/rare-tumors/rare-soft-tissue-tumors/desmoplastic-small-round-cell-tumors).
- Extrarenal (extracranial) rhabdoid tumor. Rhabdoid tumor most often occurs in the kidney or the brain, but can form in the soft tissues. Learn about Extra-Cranial Malignant Rhabdoid Tumor (MRT) (https://www.cancer.gov/pediatric-adult-rare-tumor/rare-tumors/rare-soft-tissue-tumors/extra-cranial-rhabdoid-tumor).
- Perivascular epithelioid cell tumors (PEComas). Benign PEComas may occur in children with an inherited condition called tuberous sclerosis. They occur in the stomach, intestines, lungs, and genitourinary organs. PEComas grow slowly, and most are not likely to spread.
- Undifferentiated or unclassified sarcoma. These tumors usually occur in the bones or muscles that help the body move.
  - Undifferentiated pleomorphic sarcoma (malignant fibrous histiocytoma). This type of soft tissue tumor may form in parts of the body where people have received radiation therapy in the past, or as a second cancer in children with retinoblastoma. The cancer usually forms in the arms or legs and may spread to other parts of the body. Learn more about Osteosarcoma Treatment.
- Intracranial mesenchymal tumor. This type of malignant tumor forms in the brain of children, adolescents, and young adults.

## Causes and risk factors for childhood soft tissue sarcoma

Childhood soft tissue sarcoma is caused by certain changes to the way soft tissue cells function, especially how they grow and divide into new cells. Often, the exact cause of these changes is unknown. Learn more about how cancer develops at What Is Cancer? (https://www.cancer.gov/about-cancer/understanding/what-is-cancer)

A risk factor is anything that increases the chance of getting a disease. Not every child with one or more of these risk factors will develop a soft tissue sarcoma. And it will develop in some children who don't have a known risk factor.

The risk of soft tissue sarcoma may be increased if your child has one of the following inherited disorders:

- Li-Fraumeni syndrome
- RB1 gene changes
- Werner syndrome
- tuberous sclerosis
- adenosine deaminase-deficient severe combined immunodeficiency

Another risk factor is past treatment with radiation therapy.

Talk with your child's doctor if you think your child may be at risk.

## Symptoms of childhood soft tissue sarcoma

Soft tissue sarcoma may appear as a painless lump under the skin, often on an arm, a leg, the chest, or the abdomen. There may be no other symptoms at first. As the sarcoma gets bigger and presses on nearby organs, nerves, muscles, or blood vessels, it may cause symptoms, such as pain or weakness. Fever, weight loss, night sweats, and low or high blood sugar levels are rare symptoms.

Other conditions may cause the same symptoms. Check with your child's doctor if your child has any of these problems.

## Tests to diagnose childhood soft tissue sarcoma

If your child has symptoms that suggest a soft tissue sarcoma, the doctor will need to find out if these are due to cancer or another problem. The doctor will ask when the symptoms started and how often your child has been having them. They will also ask about your child's personal and family medical history and do a physical exam. Depending on these results, they may recommend tests to find out if your child has a soft tissue sarcoma, and if so, its extent (stage).

The following tests may be used to diagnose soft tissue sarcomas. The results of these tests will also help you and your child's doctor plan treatment.

### X-ray

X-ray is a type of radiation that can go through the body and make pictures of areas inside the body.

### Magnetic resonance imaging (MRI)

MRI uses a magnet, radio waves, and a computer to make a series of detailed pictures of areas in the body, such as the chest, abdomen, arms, or legs. This procedure is also called nuclear magnetic resonance imaging (NMRI).

Magnetic resonance imaging (MRI) scan. The child lies on a table that slides into the MRI machine, which takes a series of detailed pictures of areas inside the body. The positioning of the child on the table depends on the part of the body being imaged.

Magnetic resonance imaging (MRI) scan; drawing shows a child lying on a table that slides into the MRI machine, which takes a series of detailed pictures of areas inside the body.

### CT scan

CT scan (CAT scan) uses a computer linked to an x-ray machine to make a series of detailed pictures of areas inside the body, such as the chest or abdomen. The pictures are taken from different angles and are used to create 3-D views of tissues and organs. A dye may be injected into a vein or swallowed to help the organs or tissues show up more clearly. This procedure is also called computed tomography, computerized tomography, or computerized axial tomography. Learn more about Computed Tomography (CT) Scans and Cancer (https://www.cancer.gov/about-cancer/diagnosis-staging/ct-scans-fact-sheet).

Computed tomography (CT) scan. The child lies on a table that slides through the CT scanner, which takes a series of detailed x-ray pictures of areas inside the body.

Computed tomography (CT) scan; drawing shows a child lying on a table that slides through the CT scanner, which takes a series of detailed x-ray pictures of areas inside the body.

### Ultrasound

Ultrasound uses high-energy sound waves (ultrasound) that bounce off internal tissues or organs and make echoes. The echoes form a picture of body tissues called a sonogram.

### Biopsy

Biopsy is the removal of a sample of cells or tissue from the tumor so that a pathologist can view it under a microscope to check for cancer. The type of biopsy depends, in part, on the size of the mass and whether it is close to the surface of the skin or deeper in the tissue. The following types of biopsies may be used to check for soft tissue sarcoma:

- Core needle biopsy removes tissue using a wide needle. Multiple tissue samples are taken. This procedure may be guided using ultrasound, CT scan, or MRI.
- Incisional biopsy removes part of a lump or a sample of tissue.
- Excisional biopsy removes an entire lump or area of tissue that doesn't look normal. A pathologist views the tissue under a microscope to look for cancer cells. An excisional biopsy may be used to completely remove smaller tumors that are near the surface of the skin. This type of biopsy is rarely used because cancer cells may remain after the biopsy. If cancer cells remain, the cancer may come back, or it may spread to other parts of the body.
  An MRI of the tumor is done before the excisional biopsy. This is done to make a picture of where the original tumor formed and may be used to guide future surgery or radiation therapy.

If possible, it is important to have the same surgeon perform the biopsy and the surgery to remove the tumor. The placement of needles or incisions for the biopsy can affect whether the tumor can be completely removed during a future surgery.

To plan the best treatment, the sample of tissue removed during the biopsy must be large enough to find out the type of soft tissue sarcoma and do other laboratory tests. Tissue samples will be taken from the primary tumor, lymph nodes, and other areas that may have cancer cells. A pathologist views the tissue under a microscope to look for cancer cells and to find out the type and grade of the tumor. The grade of a tumor depends on how abnormal the cancer cells look under a microscope and how quickly the cells are dividing. High-grade and mid-grade tumors usually grow and spread more quickly than low-grade tumors.

One or more of the following laboratory tests may be done to study the tissue samples:

- Light and electron microscopy checks cells in a sample of tissue under regular and high-powered microscopes to look for certain changes.
- Immunocytochemistry uses antibodies to check for certain antigens (markers) in a sample of a patient's cells or tissues. The antibodies are usually linked to an enzyme or fluorescent dye. After the antibodies bind to a specific antigen in the tissue sample, the enzyme or dye is activated, and the antigen can then be seen under a microscope. This type of test may be used to tell one type of soft tissue sarcoma from another type.
- Reverse transcription–polymerase chain reaction (RT-PCR) is a laboratory method used to make many copies of a specific genetic sequence for analysis. It may be used to look for certain changes in a gene or chromosome or for activation of certain genes, which may help diagnose a disease, such as cancer.
- Cytogenetic analysis checks the chromosomes of cells in a sample of tumor tissue for broken, missing, rearranged, or extra chromosomes. Changes in certain chromosomes may be a sign of cancer. Cytogenetic analysis is used to help diagnose cancer, plan treatment, or find out how well treatment is working. Fluorescence in situ hybridization (FISH) is a type of cytogenetic analysis.
- Molecular test checks for certain genes, proteins, or other molecules in a sample of tissue, blood, or bone marrow. Molecular tests also check for certain changes in a gene or chromosome that may cause or affect the chance of developing soft tissue sarcoma. A molecular test will often help determine the type of soft tissue sarcoma.
  The Molecular Characterization Initiative offers free molecular testing to children, adolescents, and young adults with certain types of newly diagnosed cancer. The program is offered through NCI's Childhood Cancer Data Initiative. To learn more, visit About the Molecular Characterization Initiative (https://www.cancer.gov/research/areas/childhood/childhood-cancer-data-initiative/data-ecosystem/molecular-characterization).

The following tests may be used to find out if cancer has spread:

### Sentinel lymph node biopsy

Sentinel lymph node biopsy removes the sentinel lymph node during surgery. The sentinel lymph node is the first lymph node in a group of lymph nodes to receive lymphatic drainage from the primary tumor. It is therefore the first lymph node the cancer is likely to spread to from the primary tumor. To identify the sentinel lymph node, a radioactive substance, blue dye, or both is injected near the tumor. The substance or dye flows through the lymph ducts to the lymph nodes. The first lymph node to receive the substance or dye is removed. A pathologist views the tissue under a microscope to look for cancer cells. If cancer cells are found, more lymph nodes will be removed through a separate incision (cut). This is called a lymph node dissection. Sometimes, a sentinel lymph node is found in more than one group of nodes. This procedure is used for epithelioid sarcoma.

### PET-CT scan

PET-CT scan combines the pictures from a positron emission tomography (PET) scan and a computed tomography (CT) scan. The PET and CT scans are done at the same time on the same machine. The combined scans make more detailed pictures than either test would make by itself.

- For the PET scan, a small amount of radioactive sugar (also called radioactive glucose) is injected into a vein. The PET scanner rotates around the body and makes pictures of where sugar is being used in the body. Cancer cells show up brighter in the picture because they are more active and take up more sugar than normal cells do.
- For the CT scan (CAT scan), a series of detailed x-ray pictures are taken from different angles and are used to create 3-D views of tissues and organs. A dye may be injected into a vein or swallowed to help the organs or tissues show up more clearly. This procedure is also called computed tomography, computerized tomography, or computerized axial tomography. Learn more about Computed Tomography (CT) Scans and Cancer (https://www.cancer.gov/about-cancer/diagnosis-staging/ct-scans-fact-sheet).

## Getting a second opinion

You may want to get a second opinion to confirm your child's cancer diagnosis and treatment plan. If you seek a second opinion, you will need to get medical test results and reports from the first doctor to share with the second doctor. The second doctor will review the genetic test results, pathology report, slides, and scans. This doctor may agree with the first doctor, suggest changes or another approach, or provide more information about your child's tumor.

To learn more about choosing a doctor and getting a second opinion, visit Finding Cancer Care (https://www.cancer.gov/about-cancer/managing-care/finding-cancer-care). You can contact NCI's Cancer Information Service (https://www.cancer.gov/contact) via chat, email, or phone (both in English and Spanish) for help finding a doctor or hospital that can provide a second opinion. For questions you might want to ask at your appointments, visit Questions to Ask Your Doctor about Cancer (https://www.cancer.gov/about-cancer/coping/questions).

## Types of treatment for childhood soft tissue sarcoma

### Who treats children with soft tissue sarcoma?

A pediatric oncologist, a doctor who specializes in treating children with cancer, oversees treatment for soft tissue sarcoma. The pediatric oncologist works with other health care providers who are experts in treating children with soft tissue sarcoma and who specialize in certain areas of medicine. These may include a pediatric surgeon with special training in the removal of soft tissue sarcomas. Other specialists may include:

- pediatrician
- radiation oncologist
- pathologist
- pediatric nurse specialist
- rehabilitation specialist
- psychologist
- social worker
- child-life specialist
- fertility specialist
- nutritionist

There are different types of treatment for children and adolescents with soft tissue sarcoma. You and your child's cancer care team will work together to decide treatment. Often, the treatments depend on the type of soft tissue sarcoma. Many other factors will be considered, such as your child's overall health and whether the cancer is newly diagnosed or has come back.

Your child's treatment plan will include information about the cancer, the goals of treatment, treatment options, and the possible side effects. It will be helpful to talk with your child's cancer care team before treatment begins about what to expect. For help every step of the way, visit our booklet, Children with Cancer: A Guide for Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents).

Types of treatment your child might have include:

### Surgery

Surgery to completely remove the soft tissue sarcoma is done when possible. If the tumor is very large, radiation therapy or chemotherapy may be given first, to make the tumor smaller and decrease the amount of tissue that needs to be removed during surgery. This is called neoadjuvant (preoperative) therapy.

The following types of surgery may be used:

- Wide local excision removes the tumor along with some normal tissue around it.
- Amputation removes all or part of the arm or leg with cancer.
- Lymphadenectomy removes the lymph nodes with cancer.
- Mohs surgery is used to treat cancer in the skin. Individual layers of cancer tissue are removed and checked under a microscope one at a time until all cancer tissue has been removed. This type of surgery is used to treat dermatofibrosarcoma protuberans. It is also called Mohs micrographic surgery.

A second-look surgery may be needed to:

- remove any remaining cancer cells
- check the area around where the tumor was removed for cancer cells and then remove more tissue, if needed

After the doctor removes all the cancer that can be seen at the time of the surgery, some patients may be given chemotherapy or radiation therapy after surgery to kill any cancer cells that are left. Treatment given after the surgery, to lower the risk that the cancer will come back, is called adjuvant therapy.

Learn more about Surgery to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/surgery).

### Radiation therapy

Radiation therapy is a cancer treatment that uses high-energy x-rays or other types of radiation to kill cancer cells or keep them from growing. There are different types of radiation therapy:

- External radiation therapy uses a machine outside the body to send radiation toward the area of the body with cancer. Certain ways of giving radiation therapy can help keep radiation from damaging nearby healthy tissue. This type of radiation therapy may include:
  - Stereotactic body radiation therapy uses special equipment to place the patient in the same position for each radiation treatment. Once a day for several days, a radiation machine aims a larger than usual dose of radiation directly at the tumor. By having the patient in the same position for each treatment, there is less damage to nearby healthy tissue. This procedure is also called stereotactic external-beam radiation therapy and stereotaxic radiation therapy.
  - Conformal radiation therapy uses a computer to make a 3-dimensional (3-D) picture of the tumor and shapes the radiation beams to fit the tumor. This allows a high dose of radiation to reach the tumor and causes less damage to nearby healthy tissue.
  - Intensity-modulated radiation therapy (IMRT) is a type of 3-D radiation therapy that uses a computer to make pictures of the size and shape of the tumor. Thin beams of radiation of different intensities (strengths) are aimed at the tumor from many angles. This type of external radiation therapy causes less damage to nearby healthy tissue.
  - Proton beam radiation therapy is a type of high-energy, external radiation therapy that uses streams of protons (tiny particles with a positive charge) to kill tumor cells. This type of treatment can lower the amount of radiation damage to healthy tissue near a tumor.
- Internal radiation therapy uses a radioactive substance sealed in needles, seeds, wires, or catheters that are placed directly into or near the cancer.

The way radiation therapy is given depends on the type and stage of the cancer being treated, if any cancer cells remain after surgery, and the expected side effects of treatment. External and internal radiation therapy are used to treat childhood soft tissue sarcoma.

Learn more about Radiation Therapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy).

### Chemotherapy

Chemotherapy (also called chemo) uses drugs to stop the growth of cancer cells. Chemotherapy either kills the cancer cells or stops them from dividing. Chemotherapy may be given alone or with other types of treatment, such as radiation therapy.

For children with soft tissue sarcoma, chemotherapy is taken by mouth or injected into a vein. When given this way, the drugs enter the bloodstream to reach cancer cells throughout the body.

The way the chemotherapy is given depends on the type of soft tissue sarcoma being treated. Some types of soft tissue sarcoma may respond to treatment with chemotherapy.

Chemotherapy that may be used alone or in combination includes:

- cisplatin (https://www.cancer.gov/about-cancer/treatment/drugs/cisplatin)
- cyclophosphamide (https://www.cancer.gov/about-cancer/treatment/drugs/cyclophosphamide)
- dactinomycin (https://www.cancer.gov/about-cancer/treatment/drugs/dactinomycin)
- doxorubicin (https://www.cancer.gov/about-cancer/treatment/drugs/doxorubicinhydrochloride)
- hydroxyurea (https://www.cancer.gov/about-cancer/treatment/drugs/hydroxyurea)
- ifosfamide (https://www.cancer.gov/about-cancer/treatment/drugs/ifosfamide)
- methotrexate (https://www.cancer.gov/about-cancer/treatment/drugs/methotrexate-sodium)
- vinblastine (https://www.cancer.gov/about-cancer/treatment/drugs/vinblastinesulfate)
- vincristine (https://www.cancer.gov/about-cancer/treatment/drugs/vincristinesulfate)
- vinorelbine (https://www.cancer.gov/about-cancer/treatment/drugs/vinorelbinetartrate)

Other chemotherapy drugs not listed here may also be used.

Learn more about how chemotherapy works, how it is given, common side effects, and more at Chemotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/chemotherapy).

### Observation

Observation is closely monitoring a person's condition without giving any treatment until signs or symptoms appear or change. Observation may be done when:

- complete removal of the tumor is not possible
- no other treatments are available
- the tumor is not likely to damage any vital organs

Observation may be used for epithelioid hemangioendothelioma, infantile fibrosarcoma, or PEComa.

### Targeted therapy

Targeted therapy uses drugs or other substances to block the action of specific enzymes, proteins, and other molecules involved in the growth and spread of cancer cells. Targeted therapies used to treat soft tissue sarcoma include:

- Atezolizumab (https://www.cancer.gov/about-cancer/treatment/drugs/atezolizumab) is used to treat children older than 2 years with alveolar soft part sarcoma that can't be removed with surgery or has spread to other places in the body.
- Larotrectinib (https://www.cancer.gov/about-cancer/treatment/drugs/larotrectinibsulfate) is used to treat infantile fibrosarcoma.
- Sirolimus (https://www.cancer.gov/about-cancer/treatment/drugs/sirolimus-protein-bound-particles) may be used to treat PEComas.
- Tazemetostat (https://www.cancer.gov/about-cancer/treatment/drugs/tazemetostathydrobromide) is used to treat epithelioid sarcoma.

Learn more about Targeted Therapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/targeted-therapies).

### Immunotherapy

Immunotherapy is a treatment that uses the person's immune system to fight cancer. Pembrolizumab may be used to treat undifferentiated pleomorphic sarcoma (malignant fibrous histiocytoma) and progressive and recurrent soft tissue sarcoma.

Learn more about Immunotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy).

### Clinical trials

For some children, joining a clinical trial may be an option. There are different types of clinical trials for childhood cancer. For example, a treatment trial tests new treatments or new ways of using current treatments. Supportive care and palliative care trials look at ways to improve quality of life, especially for those who have side effects from cancer and its treatment.

You can use the clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials accepting participants. The search allows you to filter trials based on the type of cancer, your child's age, and where the trials are being done. Clinical trials supported by other organizations can be found on the ClinicalTrials.gov website.

Learn more about clinical trials, including how to find and join one, at Clinical Trials Information for Patients and Caregivers (https://www.cancer.gov/research/participate/clinical-trials).

## Treatment of childhood soft tissue sarcoma

To learn about the treatments listed below, visit Types of treatment for childhood soft tissue sarcoma.

### Blood vessel tumors

#### Epithelioid hemangioendothelioma

Treatment of newly diagnosed epithelioid hemangioendothelioma may include:

- surgery to remove the tumor, when possible
- immunotherapy (interferon) for tumors that are likely to spread
- targeted therapy (pazopanib or sirolimus) for tumors that are likely to spread
- chemotherapy
- radiation therapy
- palliative care

#### Angiosarcoma

Treatment of newly diagnosed angiosarcoma may include:

- surgery to completely remove the tumor
- a combination of surgery, chemotherapy, and radiation therapy for angiosarcomas that have spread
- palliative care

### Bone tumors

#### Extraskeletal osteosarcoma

Treatment of newly diagnosed extraskeletal osteosarcoma is surgery to completely remove the tumor, followed by chemotherapy.

Learn more at Osteosarcoma Treatment.

### Cartilage tumors

#### Extraskeletal mesenchymal chondrosarcoma

Treatment of newly diagnosed extraskeletal mesenchymal chondrosarcoma may include:

- Surgery to completely remove the tumor. Radiation therapy may be given before and/or after surgery.
- Chemotherapy, followed by surgery. Chemotherapy with or without radiation therapy is given after surgery.

### Fat tissue tumors

#### Liposarcoma

Treatment of newly diagnosed liposarcoma may include:

- Surgery to completely remove the tumor. If the cancer is not completely removed, a second surgery may be done.
- Chemotherapy to shrink the tumor, followed by surgery.
- Radiation therapy before or after surgery.

### Fibrous connective tissue tumors

#### Dermatofibrosarcoma protuberans

Treatment of newly diagnosed dermatofibrosarcoma protuberans may include:

- Surgery to completely remove the tumor, when possible. This may include Mohs surgery.
- Radiation therapy before or after surgery.

#### Fibrosarcoma

##### Infantile fibrosarcoma

Treatment of newly diagnosed infantile fibrosarcoma may include:

- targeted therapy (larotrectinib (https://www.cancer.gov/about-cancer/treatment/drugs/larotrectinibsulfate))
- surgery to remove the tumor before or after targeted therapy
- chemotherapy before or after surgery and targeted therapy

##### Adult-type fibrosarcoma

Treatment of adult-type newly diagnosed fibrosarcoma is surgery to completely remove the tumor, when possible.

#### Myxofibrosarcoma

Treatment of newly diagnosed myxofibrosarcoma is surgery to completely remove the tumor.

#### Low-grade fibromyxoid sarcoma

Treatment of newly diagnosed low-grade fibromyxoid sarcoma is surgery to completely remove the tumor.

### Pericytic (perivascular) tumors

#### Infantile hemangiopericytoma

Treatment of newly diagnosed infantile hemangiopericytoma is usually chemotherapy.

### Skeletal muscle tumors

#### Rhabdomyosarcoma

Learn more at Childhood Rhabdomyosarcoma Treatment.

#### Ectomesenchymoma

Treatment of newly diagnosed ectomesenchymoma may include:

- surgery
- chemotherapy
- radiation therapy

### So-called fibrohistiocytic tumors

#### Plexiform fibrohistiocytic tumor

Treatment of newly diagnosed plexiform fibrohistiocytic tumor is surgery to completely remove the tumor.

### Tumors of unknown cell origin (the place where the tumor first formed is not known)

#### Myxoma (Carney complex)

Other summaries with information related to Carney complex include:

- Childhood Heart Tumors
- Childhood Testicular Cancer
- Childhood Thyroid Cancer

#### Epithelioid sarcoma

Treatment of newly diagnosed epithelioid sarcoma may include:

- surgery to remove the tumor, when possible
- chemotherapy
- radiation therapy before or after surgery
- targeted therapy (tazemetostat (https://www.cancer.gov/about-cancer/treatment/drugs/tazemetostathydrobromide))

#### Extraskeletal myxoid chondrosarcoma

Treatment of newly diagnosed extraskeletal myxoid chondrosarcoma may include:

- surgery to remove the tumor, when possible
- radiation therapy

#### Extraskeletal Ewing sarcoma

Learn more at Ewing Sarcoma Treatment.

#### Perivascular epithelioid cell tumors (PEComas)

Treatment of newly diagnosed perivascular epithelioid cell tumors may include:

- surgery to remove the tumor
- observation, followed by surgery
- targeted therapy (sirolimus (https://www.cancer.gov/about-cancer/treatment/drugs/sirolimus-protein-bound-particles)), for tumors that have certain gene changes and cannot be removed by surgery

### Undifferentiated or unclassified sarcoma

#### Undifferentiated pleomorphic sarcoma (malignant fibrous histiocytoma)

Treatment of newly diagnosed undifferentiated pleomorphic sarcoma may include surgery. Treatment of recurrent or refractory undifferentiated pleomorphic sarcoma may include immunotherapy (pembrolizumab (https://www.cancer.gov/about-cancer/treatment/drugs/pembrolizumab)).

Learn more about the treatment of malignant fibrous histiocytoma of bone at Osteosarcoma Treatment.

### Metastatic childhood soft tissue sarcoma

Treatment of childhood soft tissue sarcoma that has spread to other parts of the body at diagnosis is chemotherapy and radiation therapy. Surgery may be done to remove tumors that have spread to the lung.

To learn more about the treatment of specific tumor types, visit Treatment of Childhood Soft Tissue Sarcoma.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of progressive or recurrent childhood soft tissue sarcoma

To learn about the treatments listed below, visit Types of treatment for childhood soft tissue sarcoma.

Treatment of progressive or recurrent childhood soft tissue sarcoma may include:

- surgery to remove cancer that has come back where it first formed or that has spread to the lungs
- surgery followed by external or internal radiation therapy, if radiation therapy has not already been given
- chemotherapy

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Side effects and late effects of treatment

Cancer treatments can cause side effects. Which side effects your child might have depends on the type of treatment they receive, the dose, and how their body reacts. Talk with your child's treatment team about which side effects to look for and ways to manage them.

To learn more about side effects that begin during treatment for cancer, visit Side Effects (https://www.cancer.gov/about-cancer/treatment/side-effects).

Problems from cancer treatment that begin 6 months or later after treatment and continue for months or years are called late effects. Late effects of cancer treatment may include:

- physical problems
- changes in mood, feelings, thinking, learning, or memory
- second cancers (new types of cancer)

Some late effects may be treated or controlled. It is important to talk with your child's doctors about the effects cancer treatment can have on your child. Learn more about Late Effects of Treatment for Childhood Cancer.

## Prognostic factors for childhood soft tissue sarcoma

If your child has been diagnosed with a soft tissue sarcoma, you may have questions about how serious the cancer is and your child's chances of survival. The likely outcome or course of a disease is called prognosis. The prognosis depends on:

- the part of the body where the tumor first formed
- the size and grade of the tumor
- the type of soft tissue sarcoma
- how deep the tumor is under the skin
- whether the tumor has spread to other places in the body and where it has spread
- the amount of tumor remaining after surgery to remove it
- whether radiation therapy was used to treat the tumor
- whether the cancer has just been diagnosed or has recurred (come back)

No two people are alike, and responses to treatment can vary greatly. Your child's cancer care team is in the best position to talk with you about your child's prognosis.

## Follow-up care

As your child goes through treatment, they will have follow-up tests or check-ups. Some of the tests that were done to diagnose the cancer may be repeated to see how well the treatment is working. Decisions about whether to continue, change, or stop treatment may be based on the results of these tests.

Some of the tests will continue to be done from time to time after treatment has ended. The results of these tests can show if your child's condition has changed or if the cancer has recurred (come back).

Learn more about the follow-up tests in Tests to diagnose childhood soft tissue sarcoma.

## Coping with your child's cancer

When your child has cancer, every member of the family needs support. Taking care of yourself during this difficult time is important. Reach out to your child's treatment team and to people in your family and community for support. To learn more, visit Support for Families: Childhood Cancer (https://www.cancer.gov/about-cancer/coping/caregiver-support/parents) and the booklet Children with Cancer: A Guide for Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents).

## Related resources

For more childhood cancer information and other general cancer resources, visit:

- Soft Tissue Sarcoma Home Page (https://www.cancer.gov/types/soft-tissue-sarcoma)
- MyPART - My Pediatric and Adult Rare Tumor Network (https://www.cancer.gov/nci/pediatric-adult-rare-tumor/rare-tumors/rare-soft-tissue-tumors)
- About Cancer (https://www.cancer.gov/about-cancer)
- Childhood Cancers (https://www.cancer.gov/types/childhood-cancers)
- CureSearch for Children's Cancer (http://www.curesearch.org/)
- Adolescents and Young Adults with Cancer (https://www.cancer.gov/types/aya)
- Cancer in Children and Adolescents (https://www.cancer.gov/types/childhood-cancers/child-adolescent-cancers-fact-sheet)
- For Survivors, Caregivers, and Advocates (https://cancercontrol.cancer.gov/ocs/resources/survivors.html)

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the treatment of childhood soft tissue sarcoma. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Pediatric Treatment Editorial Board. PDQ Childhood Soft Tissue Sarcoma. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/soft-tissue-sarcoma/patient/child-soft-tissue-treatment-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389342]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).